# Childhood Breast Tumors Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood breast tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Childhood Benign Breast Tumors (Fibroadenoma and Phyllodes)

### Incidence and Risk Factors

Benign fibroadenomas are the most common breast tumors seen in children aged 18 years or younger.[1,2] The prevalence of fibroadenoma is 2.2% in females aged 10 to 30 years.[1,2] The incidence increases with age, although girls aged 12 to 16 years tend to have larger lesions than women aged 17 years and older.[3] More than 95% of patients are female. Types of fibroadenoma in children aged 18 years or younger include simple fibroadenoma (70%–90% of cases) and giant juvenile fibroadenoma (0.5%–2% of cases).[2]

Fibroadenomas have been associated with Beckwith-Wiedemann, Maffucci, and Cowden syndromes.[2]

Other benign breast masses include tubular adenomas, benign phyllodes tumors, and benign fibroepithelial neoplasms.[4]

### Clinical Presentation

Fibroadenoma usually presents as an asymptomatic mass that can vary in size with a woman's menstrual cycle. They can cause localized pain or breast asymmetry. They can also be associated with skin ulceration and venous engorgement.[2,4]

Giant juvenile fibroadenomas have been variably defined as any rapidly enlarging encapsulated fibroadenoma with a diameter greater than 5 cm, a weight more than 500 g, or displacement of at least four-fifths of the breast.[2,4]

In one retrospective series of 80 girls aged 12 to 18 years with fibroadenomas, 10% of patients had bilateral disease, and 2.5% of patients had unilateral disease but more than one nodule (multicentric fibroadenoma).[3]

### Diagnosis

Fibroadenomas are benign biphasic tumors with epithelial and stromal components that have variable mitotic activity.[3] These tumors can be difficult to distinguish from phyllodes tumors when a tumor sample is obtained using fine needle aspiration or core needle biopsy.

Fine needle aspiration is not considered to be adequate for diagnosis. Indications for core needle biopsy or excision of a suspected fibroadenoma in children and adolescents are not based on evidence. The indications include tumor size at presentation of 2 cm to 5 cm (or larger), tumor enlargement during 2 to 12 months of observation, and multiple breast masses or bilateral breast masses.[2,5]

One single-institution retrospective review conducted between 1999 and 2018 aimed to characterize the breast masses of 70 females aged 19 years or younger with fibroadenomas who underwent excision of masses between 2 cm and 16 cm. Histological evaluation found that 87% of the breast masses were benign, 10% of the masses were benign phyllodes tumors that were aggressive in nature (n = 7), one mass was a malignant phyllodes tumor, and one mass was a metastatic sarcoma.[5]

Pathological examination of the core needle biopsy specimen may underestimate or overestimate the aggressiveness of lesions when compared with what is found on excision in about 13% of patients.[5]

Another single-institution retrospective analysis performed genomic profiling on 44 fibroadenomas and 36 giant fibroadenomas.[6] The giant fibroadenomas were biologically distinct from fibroadenomas of the breast, with overexpression of genes involved in the regulation of cell growth and immune response.

### Treatment of Fibroadenoma and Phyllodes Tumors

Treatment options for fibroadenoma include the following:

1. Observation.
2. Surgery.

#### Observation

Evidence (observation):

1. A study of 29 patients with presumed fibroadenomas were diagnosed prospectively over a 13-month period via physical examination.[7]
  - Nine presumed fibroadenomas (31%) resolved during the follow-up period of 1 to 12 months, and four presumed fibroadenomas (14%) became smaller.
  - Twelve teenagers underwent ultrasonography and had solid masses. None of these masses resolved after a year of observation. In addition, resection determined that all of these masses were fibroadenomas.

There is no evidence that childhood or adolescent fibroadenomas have carcinomatous potential.

#### Surgery

Indications for resection include tumor size at presentation of 2 cm to 5 cm (or larger); tumor enlargement during 2 to 12 months of observation; multiple breast masses or bilateral breast masses; and patient, parental, or provider anxiety.[1,2]

Evidence (surgery):

1. In one series of 39 patients with fibroadenomas who had follow-up after resection, the following was observed:[3]
  - Six patients experienced recurrences between 2 years and 7.5 years (median, 4.9 years) later.
  - Tumor size, mitotic index, and mesenchymal cellularity did not predict recurrences, and all recurrent tumors were benign.

Surgical complications have included breast hypoplasia, acute pain, and chronic pain.[8]

While recurrence is rare, careful follow-up monitoring is important. Recurrent tumors can be resected successfully using conservative techniques.[8]

Treatment options for phyllodes tumors include the following:

1. Surgery.

#### Surgery (wide local excision without mastectomy)

Phyllodes tumors can be very large and challenging to treat surgically in women with smaller breasts. Complete excision of the phyllodes tumor with grossly negative margins and a small amount of normal tissue circumferentially is necessary. Radical mastectomy or modified radical mastectomy should be avoided. Lymph node evaluation is not necessary.[9]

Phyllodes tumors present a small risk of recurrence, as they fall into the intermediate-grade sarcoma category. These tumors do not metastasize, but they can recur locally.

### References

Jayasinghe Y, Simmons PS: Fibroadenomas in adolescence. Curr Opin Obstet Gynecol 21 (5): 402-6, 2009.19606032
Lee M, Soltanian HT: Breast fibroadenomas in adolescents: current perspectives. Adolesc Health Med Ther 6: 159-63, 2015.26366109
Sun C, Zhang W, Ma H, et al.: Main Traits of Breast Fibroadenoma Among Adolescent Girls. Cancer Biother Radiopharm 35 (4): 271-276, 2020.32267738
McLaughlin CM, Gonzalez-Hernandez J, Bennett M, et al.: Pediatric breast masses: an argument for observation. J Surg Res 228: 247-252, 2018.29907218
Zmora O, Klin B, Iacob C, et al.: Characterizing excised breast masses in children and adolescents-Can a more aggressive pathology be predicted? J Pediatr Surg 55 (10): 2197-2200, 2020.32061367
Yin Lee JP, Thomas AJ, Lum SK, et al.: Gene expression profiling of giant fibroadenomas of the breast. Surg Oncol 37: 101536, 2021.33677364
Neinstein LS, Atkinson J, Diament M: Prevalence and longitudinal study of breast masses in adolescents. J Adolesc Health 14 (4): 277-81, 1993.8347638
Javed A, Jenkins SM, Labow B, et al.: Intermediate and long-term outcomes of fibroadenoma excision in adolescent and young adult patients. Breast J 25 (1): 91-95, 2019.30444280
Valdes EK, Boolbol SK, Cohen JM, et al.: Malignant transformation of a breast fibroadenoma to cystosarcoma phyllodes: case report and review of the literature. Am Surg 71 (4): 348-53, 2005.15943412

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Information about these tumors may also be found in sources relevant to adults with cancer, such as Breast Cancer Treatment.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Childhood Breast Cancer

### Incidence, Histological Types, and Prognosis

Breast cancer has been reported in both males and females younger than 21 years.[1-5]; [6][Level of evidence C1]

A review of the Surveillance, Epidemiology, and End Results (SEER) Program database of the National Cancer Institute shows that 75 cases of malignant breast tumors in females aged 19 years or younger were identified from 1973 to 2004.[7]

- Fifteen percent of these patients had in situ disease, and 85% of patients had invasive disease.
- Fifty-five percent of the tumors were carcinomas, and 45% of the tumors were sarcomas, most of which were phyllodes tumors.
- Only three patients in the carcinoma group presented with metastatic disease, while 11 patients (27%) had regionally advanced disease. All patients with sarcomas presented with localized disease.
- Of the carcinoma patients, 85% underwent surgical resection, and 10% received adjuvant radiation therapy.
- Of the sarcoma patients, 97% had surgical resection, and 9% received radiation therapy.
- The 5- and 10-year survival rates for patients with sarcomatous tumors were both 90%.
- For patients with carcinomas, the 5-year survival rate was 63%, and the 10-year survival rate was 54%.

A National Cancer Database report described 181 cases of breast malignancies in patients aged 21 years and younger.[4]

- Sixty-five percent of patients had invasive carcinoma, and the remaining patients had sarcoma or malignant phyllodes.
- Pediatric patients were more likely to have an undifferentiated malignancy, more advanced disease at presentation, and more variable management.
- Outcomes in children and adult patients were similar.

A subsequent report from the SEER database (1973–2009) discovered 91 girls aged 10 to 20 years with breast cancer.[6][Level of evidence C1]

- These cancers were predominantly carcinomas (57% invasive, 5.5% in situ) and sarcomas (37%, mostly phyllodes tumors).
- The mortality rate was 46.6% for patients with regional disease and 18.7% for patients with localized disease.
- The mortality rates for the patients in this study were higher than the rates for premenopausal and postmenopausal women, although the sample size was small.

While rare, breast cancer in males has also been described. In a review of the National Cancer Database, 677 male adolescent and young adult (AYA) patients were diagnosed with breast cancer between 1998 and 2010.[3]

- Most of these patients (82%) had invasive disease.
- Age younger than 25 years and absence of nodal evaluation at the time of surgery were associated with worse outcomes.

Breast tumors may also occur as metastatic deposits from leukemia, rhabdomyosarcoma, other sarcomas, or lymphoma (particularly in patients who are infected with HIV).

### Risk Factors

Risk factors for breast cancer in AYA people include the following:

1. Previous malignancy. A retrospective review of the American College of Surgeons National Cancer Database from 1998 to 2010 identified 106,771 patients aged 15 to 39 years with breast cancer.[8] Of these patients, 6,241 (5.8%) had experienced a previous histologically distinct malignancy. Patients with breast cancer as a subsequent neoplasm had a significantly decreased 3-year overall survival rate, compared with patients with breast cancer as a primary malignancy (79% vs. 88.5%, P < .001). Subsequent neoplasm status was identified as an independent risk factor for increased mortality (hazard ratio, 1.58; 95% confidence interval, 1.41–1.77).
2. Chest irradiation. There is an increased lifetime risk of breast cancer in female survivors of Hodgkin lymphoma who were treated with radiation to the chest area. However, breast cancer is also seen in patients who were treated with chest irradiation for any cancer.[9-13][Level of evidence A2] Carcinomas are more frequent than sarcomas in these patients.
  Mammography with adjunctive breast magnetic resonance imaging (MRI) starts at age 25 years or 8 years after exposure to radiation therapy (whichever came last). For more information about secondary breast cancers, see Late Effects of Treatment for Childhood Cancer.

### Genetic Factors

Homologous recombination deficiency (HRD) is a prevalent phenotype of breast cancer in AYA patients (aged 15–39 years). HRD influences the efficacy of PARP inhibitor–based therapy and platinum agent–based therapy.[14,15]

An analysis of 46 Japanese AYA patients with breast cancer and two existing breast cancer cohorts of U.S. and European patients identified an HRD-high phenotype that was associated with germline BRCA1 and BRCA2 pathogenic variants, somatic TP53 variants, triple-negative subtype, and higher tumor grade.[14] A model based on three of these factors, excluding germline BRCA1 and BRCA2 pathogenic variants, yielded high predictive power of death in cases from these two cohorts without germline BRCA1 or BRCA2 pathogenic variants; the area under the receiver operating characteristic curve was 0.92 and 0.90, respectively.

### Treatment of Breast Cancer in Adolescents and Young Adults (AYA)

Breast cancer is the most frequently diagnosed cancer among AYA women aged 15 to 39 years, accounting for about 14% of all AYA cancer diagnoses.[16] Breast cancer in this age group has a more aggressive course and worse outcome than in older women. Expression of hormone receptors for estrogen, progesterone, and human epidermal growth factor receptor 2 (HER2) on breast cancer in the AYA group is also different from that in older women and correlates with a worse prognosis.[8,17]

In a review of data from the National Cancer Database, AYA patients (aged 15–39 years) had a higher incidence of triple-negative breast cancer (TNBC) or HER2-positive (HER2+) cancer than did adult patients (TNBC: 21.2% vs. 13.8%, respectively; HER2+: 26.0% vs. 18.6%, respectively; both P < .001). In addition, patients aged 15 to 29 years had more advanced disease and TNBC or HER2+ disease than did patients aged 30 to 39 years.[18][Level of evidence C1]

Treatment of AYA patients is similar to that of older women. However, unique aspects of management include attention to genetic implications (i.e., familial breast cancer syndromes) and fertility.[19,20]

For more information, see Breast Cancer Treatment and Genetics of Breast and Gynecologic Cancers.

### Treatment Options Under Clinical Evaluation for Childhood and AYA Breast Cancer

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- NCT05879926 (https://www.cancer.gov/clinicaltrials/NCT05879926) (Testing the Addition of Chemotherapy to the Usual Treatment of Ovarian Function Suppression Plus Hormonal Therapy in Premenopausal Estrogen Receptor (ER)–Positive/HER2-Negative Breast Cancer Patients Who Are At High Risk of Cancer Returning [OFSET Trial]): This phase III trial will determine whether adjuvant chemotherapy added to ovarian function suppression and endocrine therapy improves invasive breast cancer–free survival among premenopausal, early-stage breast cancer patients (aged 18 years and older) with ER-positive, HER2-negative tumors and a 21-gene recurrence score between 16 and 25 (for pN0 patients) or 0 and 25 (for pN1 patients).

### References

Rivera-Hueto F, Hevia-Vázquez A, Utrilla-Alcolea JC, et al.: Long-term prognosis of teenagers with breast cancer. Int J Surg Pathol 10 (4): 273-9, 2002.12490977
Costa NM, Rodrigues H, Pereira H, et al.: Secretory breast carcinoma--case report and review of the medical literature. Breast 13 (4): 353-5, 2004.15325674
Flaherty DC, Bawa R, Burton C, et al.: Breast Cancer in Male Adolescents and Young Adults. Ann Surg Oncol 24 (1): 84-90, 2017.27650826
Richards MK, Goldin AB, Beierle EA, et al.: Breast Malignancies in Children: Presentation, Management, and Survival. Ann Surg Oncol 24 (6): 1482-1491, 2017.28058544
Veiga LH, Curtis RE, Morton LM, et al.: Association of Breast Cancer Risk After Childhood Cancer With Radiation Dose to the Breast and Anthracycline Use: A Report From the Childhood Cancer Survivor Study. JAMA Pediatr 173 (12): 1171-1179, 2019.31657853
Murthy V, Pawar S, Chamberlain RS: Disease Severity, Presentation, and Clinical Outcomes Among Adolescents With Malignant Breast Neoplasms: A 20-Year Population-Based Outcomes Study From the SEER Database (1973-2009). Clin Breast Cancer 17 (5): 392-398, 2017.28602452
Gutierrez JC, Housri N, Koniaris LG, et al.: Malignant breast cancer in children: a review of 75 patients. J Surg Res 147 (2): 182-8, 2008.18498867
Sadler C, Goldfarb M: Comparison of primary and secondary breast cancers in adolescents and young adults. Cancer 121 (8): 1295-302, 2015.25537724
Kaste SC, Hudson MM, Jones DJ, et al.: Breast masses in women treated for childhood cancer: incidence and screening guidelines. Cancer 82 (4): 784-92, 1998.9477113 98135980
Metayer C, Lynch CF, Clarke EA, et al.: Second cancers among long-term survivors of Hodgkin's disease diagnosed in childhood and adolescence. J Clin Oncol 18 (12): 2435-43, 2000.10856104
Swerdlow AJ, Barber JA, Hudson GV, et al.: Risk of second malignancy after Hodgkin's disease in a collaborative British cohort: the relation to age at treatment. J Clin Oncol 18 (3): 498-509, 2000.10653865 20120868
van Leeuwen FE, Klokman WJ, Veer MB, et al.: Long-term risk of second malignancy in survivors of Hodgkin's disease treated during adolescence or young adulthood. J Clin Oncol 18 (3): 487-97, 2000.10653864 20120867
Henderson TO, Amsterdam A, Bhatia S, et al.: Systematic review: surveillance for breast cancer in women treated with chest radiation for childhood, adolescent, or young adult cancer. Ann Intern Med 152 (7): 444-55; W144-54, 2010.20368650
Watanabe T, Honda T, Totsuka H, et al.: Simple prediction model for homologous recombination deficiency in breast cancers in adolescents and young adults. Breast Cancer Res Treat 182 (2): 491-502, 2020.32488393
Kataoka A, Tokunaga E, Masuda N, et al.: Clinicopathological features of young patients (<35 years of age) with breast cancer in a Japanese Breast Cancer Society supported study. Breast Cancer 21 (6): 643-50, 2014.23588791
Keegan TH, DeRouen MC, Press DJ, et al.: Occurrence of breast cancer subtypes in adolescent and young adult women. Breast Cancer Res 14 (2): R55, 2012.22452927
Anders CK, Hsu DS, Broadwater G, et al.: Young age at diagnosis correlates with worse prognosis and defines a subset of breast cancers with shared patterns of gene expression. J Clin Oncol 26 (20): 3324-30, 2008.18612148
Murphy BL, Day CN, Hoskin TL, et al.: Adolescents and Young Adults with Breast Cancer have More Aggressive Disease and Treatment Than Patients in Their Forties. Ann Surg Oncol 26 (12): 3920-3930, 2019.31376035
Gabriel CA, Domchek SM: Breast cancer in young women. Breast Cancer Res 12 (5): 212, 2010.21067532
Tichy JR, Lim E, Anders CK: Breast cancer in adolescents and young adults: a review with a focus on biology. J Natl Compr Canc Netw 11 (9): 1060-9, 2013.24029122

## Latest Updates to This Summary (09/11/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was comprehensively reviewed.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood breast tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Breast Tumors Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Alberto S. Pappo, MD (St. Jude Children's Research Hospital)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)
- Stephen J. Shochat, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Breast Tumors Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/breast/hp/child-breast-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 31593386]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).